# Thyroid Cancer Screening (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the screening of thyroid cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What Is Screening?

Screening is looking for cancer before a person has any symptoms. This can help find cancer at an early stage. When abnormal tissue or cancer is found early, it may be easier to treat. By the time symptoms appear, cancer may have begun to spread.

Scientists are trying to better understand which people are more likely to get certain types of cancer. They also study the things we do and the things around us to see if they cause cancer. This information helps doctors recommend who should be screened for cancer, which screening tests should be used, and how often the tests should be done.

It is important to remember that your doctor does not necessarily think you have cancer if he or she suggests a screening test. Screening tests are given when you have no cancer symptoms.

If a screening test result is abnormal, you may need to have more tests done to find out if you have cancer. These are called diagnostic tests.

## General Information About Thyroid Cancer

Key Points for This Section
- Thyroid cancer is a disease in which malignant (cancer) cells form in the tissues of the thyroid gland.
- Thyroid cancer is found more often in women.
- Being exposed to radiation increases the risk of thyroid cancer.

### Thyroid cancer is a disease in which malignant (cancer) cells form in the tissues of the thyroid gland.

The thyroid is a gland at the base of the throat near the trachea (windpipe). It is shaped like a butterfly, with a right lobe and a left lobe. The isthmus, a thin piece of tissue, connects the two lobes. A healthy thyroid is about the size of a walnut. It usually cannot be felt through the skin.

Anatomy of the thyroid and parathyroid glands. The thyroid gland lies at the base of the throat near the trachea. It is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The parathyroid glands are four pea-sized organs found in the neck near the thyroid. The thyroid and parathyroid glands make hormones.

Anatomy of the thyroid and parathyroid glands; drawing shows the thyroid gland at the base of the throat near the trachea. An inset shows the front and back views. The front view shows that the thyroid is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The back view shows the four pea-sized parathyroid glands. The larynx is also shown.

The thyroid uses iodine, a mineral found in some foods and in iodized salt, to help make several hormones. Thyroid hormones do the following:

- Control heart rate, body temperature, and how quickly food is changed into energy (metabolism).
- Control the amount of calcium in the blood.

Learn more about thyroid cancer at Thyroid Cancer Treatment.

### Thyroid cancer is found more often in women.

Thyroid cancer is most often diagnosed in men and women aged 45 to 64 years. It is the most commonly diagnosed cancer in women aged 20 to 34 years. Women are about three times more likely than men to have thyroid cancer.

The number of people diagnosed with thyroid cancer in the United States increased from 1974 to 2013, but the number of deaths from thyroid cancer has stayed the same or decreased slightly. Rates of thyroid cancer leveled off from 2013 to 2016, and there was a decrease in the rate of thyroid tumors less than 1 centimeter in size. Most cases of thyroid cancer respond to treatment and are usually cured.

### Being exposed to radiation increases the risk of thyroid cancer.

Anything that increases a person's chance of getting a disease is called a risk factor. Not every person with one or more of these risk factors will develop thyroid cancer, and it will also develop in some people who don't have any known risk factors. Talk with your doctor if you think you may be at risk.

Risk factors for thyroid cancer include:

- Being exposed to radiation to the head and neck as an infant or child or being exposed to radiation from a radioactive fallout. The cancer may occur as soon as 5 years after exposure.
- Having a family history of thyroid disease or thyroid cancer.
- Having a history of goiter (enlarged thyroid).
- Having a genetic condition such as multiple endocrine neoplasia type 2 syndrome (MEN2), which is caused by a change in the RET gene.
- Being female.
- Being Asian.

## Thyroid Cancer Screening

Key Points for This Section
- Tests are used to screen for different types of cancer when a person does not have symptoms.
- There is no standard or routine screening test for thyroid cancer.
- Screening for thyroid cancer may not help a person live longer.
- Screening tests for thyroid cancer are being studied in clinical trials.

### Tests are used to screen for different types of cancer when a person does not have symptoms.

Scientists study screening tests to find those with the fewest harms and most benefits. Cancer screening trials also are meant to show whether early detection (finding cancer before it causes symptoms) helps a person live longer or decreases a person's chance of dying from the disease. For some types of cancer, the chance of recovery is better if the disease is found and treated at an early stage.

### There is no standard or routine screening test for thyroid cancer.

There is no standard or routine screening test used for early detection of thyroid cancer. Thyroid cancer that does not cause symptoms may be found during:

- A routine physical exam when the doctor checks a person's neck for lumps (nodules) or swelling in the neck, voice box, and lymph nodes, or anything else that seems unusual.
- A surgery that is done for another condition.
- An ultrasound that is done for another condition.

### Screening for thyroid cancer may not help a person live longer.

Studies have shown that screening for thyroid cancer does not decrease the chance of dying from the disease. No randomized clinical trials have been done in the United States to find out if a neck exam, ultrasound, or other screening test decreases the risk of dying from thyroid cancer. Neck exams and ultrasound are sometimes used to screen for thyroid cancer but do not decrease the risk of dying from the disease.

### Screening tests for thyroid cancer are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## Risks of Thyroid Cancer Screening

Key Points for This Section
- Screening tests have risks.
- The risks of thyroid cancer screening include:
  - Finding thyroid cancer that may never cause symptoms or become life threatening.
  - False-negative test results can occur.
  - False-positive test results can occur.

### Screening tests have risks.

Decisions about screening tests can be difficult. Not all screening tests are helpful, and most have risks. Before having any screening test, you may want to discuss the test with your doctor. It is important to know the risks of the test and whether it has been proven to reduce the risk of dying from cancer.

### The risks of thyroid cancer screening include:

#### Finding thyroid cancer that may never cause symptoms or become life threatening.

When a screening test result leads to the diagnosis and treatment of a disease that may never have caused symptoms or become life-threatening, it is called overdiagnosis. Diagnostic tests (such as a fine-needle aspiration biopsy) and cancer treatments (such as surgery and radioactive iodine therapy) can have serious risks, including physical and emotional problems.

#### False-negative test results can occur.

Screening test results may appear to be normal even though thyroid cancer is present. A person who receives a false-negative test result (one that shows there is no cancer when there really is) may delay seeking medical care even if there are symptoms.

#### False-positive test results can occur.

Screening test results may appear to be abnormal even though no cancer is present. A false-positive test result (one that shows there is cancer when there really isn't) can cause anxiety and is usually followed by more tests and procedures (such as a fine-needle aspiration biopsy), which also have risks.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the screening of thyroid cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Thyroid Cancer Screening. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/thyroid/patient/thyroid-screening-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).